# Childhood Chordoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric chordoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Incidence

Chordoma is a very rare tumor of bone. It arises from remnants of the notochord within the clivus, spinal vertebrae, or sacrum. The most common site in children is the cranium.[1] The incidence in the United States is approximately 1 case per 1 million people per year. Only 5% of all chordomas occur in patients younger than 20 years.[2,3] Most pediatric patients have the classical or chondroid variant of chordoma, while the dedifferentiated variant is rare in children.[2,4]

### References

Sebro R, DeLaney T, Hornicek F, et al.: Differences in sex distribution, anatomic location and MR imaging appearance of pediatric compared to adult chordomas. BMC Med Imaging 16 (1): 53, 2016.27609115
Hoch BL, Nielsen GP, Liebsch NJ, et al.: Base of skull chordomas in children and adolescents: a clinicopathologic study of 73 cases. Am J Surg Pathol 30 (7): 811-8, 2006.16819322
Lau CS, Mahendraraj K, Ward A, et al.: Pediatric Chordomas: A Population-Based Clinical Outcome Study Involving 86 Patients from the Surveillance, Epidemiology, and End Result (SEER) Database (1973-2011). Pediatr Neurosurg 51 (3): 127-36, 2016.26881831
McMaster ML, Goldstein AM, Bromley CM, et al.: Chordoma: incidence and survival patterns in the United States, 1973-1995. Cancer Causes Control 12 (1): 1-11, 2001.11227920

## Clinical Presentation and Diagnosis

Patients with chordomas usually present with pain (headache or sacrum) or diplopia. Patients may also present with or without neurological deficits such as cranial or other nerve impairment.[1]

The diagnosis of a chordoma is straightforward when the typical physaliferous (soap bubble–bearing) cells are present. The differential diagnosis is sometimes difficult and includes dedifferentiated chordoma and chondrosarcoma. Childhood chordoma has been associated with tuberous sclerosis complex.[2]

### References

John L, Smith H, Ilanchezhian M, et al.: The NIH pediatric/young adult chordoma clinic and natural history study: Making advances in a very rare tumor. Pediatr Blood Cancer : e30358, 2023.37347686
McMaster ML, Goldstein AM, Parry DM: Clinical features distinguish childhood chordoma associated with tuberous sclerosis complex (TSC) from chordoma in the general paediatric population. J Med Genet 48 (7): 444-9, 2011.21266383

## Prognosis and Molecular Features

Younger children with chordomas appear to have a worse outlook than older patients.[1-6] The survival rate ranges from about 50% to 80% for children and adolescents with cranial chordomas.[2,3,5] However, in a National Cancer Database review, the overall survival (OS) of pediatric and adult patients with cranial chordomas was similar (70% at 10 years).[7]

- A retrospective literature review and review of institutional patients identified 682 patients with spinal chordomas. The median age of patients was 57 years.[8][Level of evidence C1]
  - Age younger than 18 years, sacral spine tumor location, dedifferentiated pathology, and treatment with chemotherapy were associated with a lower probability for progression-free survival (PFS).
  - Younger age (<18 years), older age (>65 years), bladder or bowel dysfunction at presentation, dedifferentiated pathology, disease recurrence or progression, and metastatic disease were associated with a worse OS.
- Histopathology is also an important prognostic factor. Patients who have tumors with typical or chondroid pathology have worse outcomes than patients who have tumors with classical pathology.[9][Level of evidence C1]
- A multicenter retrospective study identified 40 children with chordomas (median age, 12 years).[10][Level of evidence C1]
  - Most of the patients had the histologically classical form of chordoma (45.5%).
  - Most of the chordomas were located at the skull base (72.5%).
  - The OS rates were 66.6% at 5 years and 58.6% at 10 years.
  - The PFS rates were 55.7% at 5 years and 52% at 10 years.
  - Total resection correlated with a better outcome (log-rank P = .04 for OS and PFS).
  - Loss of BAF47 immunoexpression appeared to be a significant independent adverse prognostic factor (P = .033 for PFS).
- A retrospective analysis identified seven children with poorly differentiated chordomas.[11][Level of evidence C1]
  - The median survival of these patients was 9 months.
  - All poorly differentiated chordomas showed loss of SMARCB1 expression by immunohistochemistry. Copy number profiles were derived from intensity measures of the methylation probes and indicated 22q losses affecting the SMARCB1 region in all poorly differentiated chordomas.
  Inactivation of the SMARCB1 gene is common in poorly differentiated chordomas of childhood, and it is associated with a poor prognosis.[11]
- The National Cancer Institute (NCI) analyzed germline DNA from a cohort of 24 patients with chordomas who were referred to the NCI (age range, 5–57 years).[12]
  - Pathogenic variants in cancer predisposition genes were identified in 9 of the 24 patients (38%).
  - Germline pathogenic variants in CHEK2 were found in three patients. Six patients had germline pathogenic variants in other genes, one each in BRCA2, RET, FANCA, RAD51C, FH, and BAP1.
- A retrospective study analyzed whole-exome and mitochondrial DNA genome sequencing of 29 chordomas from 23 pediatric patients. The findings were compared with the results of whole-genome sequencing of chordomas from 80 adult patients.[13]
  - In the pediatric chordoma cohort, 81% of the somatic mitochondrial DNA variants were observed in NADH complex genes, which are significantly enriched compared with the rest of the mitochondrial DNA genes (P = .001).

### References

Coffin CM, Swanson PE, Wick MR, et al.: Chordoma in childhood and adolescence. A clinicopathologic analysis of 12 cases. Arch Pathol Lab Med 117 (9): 927-33, 1993.8368907
Borba LA, Al-Mefty O, Mrak RE, et al.: Cranial chordomas in children and adolescents. J Neurosurg 84 (4): 584-91, 1996.8613849
Hoch BL, Nielsen GP, Liebsch NJ, et al.: Base of skull chordomas in children and adolescents: a clinicopathologic study of 73 cases. Am J Surg Pathol 30 (7): 811-8, 2006.16819322
Jian BJ, Bloch OG, Yang I, et al.: A comprehensive analysis of intracranial chordoma and survival: a systematic review. Br J Neurosurg 25 (4): 446-53, 2011.21749184
Yasuda M, Bresson D, Chibbaro S, et al.: Chordomas of the skull base and cervical spine: clinical outcomes associated with a multimodal surgical resection combined with proton-beam radiation in 40 patients. Neurosurg Rev 35 (2): 171-82; discussion 182-3, 2012.21863225
Chambers KJ, Lin DT, Meier J, et al.: Incidence and survival patterns of cranial chordoma in the United States. Laryngoscope 124 (5): 1097-102, 2014.24122844
Xu JC, Lehrich BM, Yasaka TM, et al.: Characteristics and overall survival in pediatric versus adult skull base chordoma: a population-based study. Childs Nerv Syst 37 (6): 1901-1908, 2021.33459820
Zhou J, Sun J, Bai HX, et al.: Prognostic Factors in Patients With Spinal Chordoma: An Integrative Analysis of 682 Patients. Neurosurgery 81 (5): 812-823, 2017.28368502
Tsitouras V, Wang S, Dirks P, et al.: Management and outcome of chordomas in the pediatric population: The Hospital for Sick Children experience and review of the literature. J Clin Neurosci 34: 169-176, 2016.27590862
Beccaria K, Tauziède-Espariat A, Monnien F, et al.: Pediatric Chordomas: Results of a Multicentric Study of 40 Children and Proposal for a Histopathological Prognostic Grading System and New Therapeutic Strategies. J Neuropathol Exp Neurol 77 (3): 207-215, 2018.29361006
Hasselblatt M, Thomas C, Hovestadt V, et al.: Poorly differentiated chordoma with SMARCB1/INI1 loss: a distinct molecular entity with dismal prognosis. Acta Neuropathol 132 (1): 149-51, 2016.27067307
Raygada M, John L, Liu A, et al.: Germline findings in cancer predisposing genes from a small cohort of chordoma patients. J Cancer Res Clin Oncol 150 (5): 227, 2024.38700789
O'Halloran K, Hakimjavadi H, Bootwalla M, et al.: Pediatric Chordoma: A Tale of Two Genomes. Mol Cancer Res 22 (8): 721-729, 2024.38691518

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Treatment of Childhood Chordoma

One report described the value of using a multidisciplinary clinic for patients with these very rare tumors.[1] Treatment options for childhood chordoma include the following:

1. Surgery with or without radiation therapy.
2. Tyrosine kinase inhibitor (TKI) therapy.

### Surgery With or Without Radiation Therapy

Standard treatment includes surgery and external radiation therapy, often proton-beam radiation.[2,3] Surgery is often not curative in children and adolescents because of the likelihood of the chordomas arising in the skull base, rather than in the sacrum, making them relatively inaccessible for complete surgical excision. However, if gross-total resection can be achieved, outcome is improved.[4][Level of evidence C1]

The best results have been obtained using proton-beam therapy (charged-particle radiation therapy) because these tumors are relatively radiation resistant, and radiation-dose conformality with protons allows for higher tumor doses while sparing adjacent critical normal tissues.[5-8]; [2,9][Level of evidence C1]; [10][Level of evidence C2]

Evidence (surgery and/or radiation therapy):

1. In a retrospective study of 20 children with skull-based chordomas, the median age at diagnosis was 12 years. The most common presenting symptoms were diplopia, headache, and swallowing difficulties.[11] Five patients had locally recurrent tumors. Twelve patients underwent surgery with an endoscopic endonasal approach alone, and eight patients underwent other procedures. All but two patients received radiation therapy. Fourteen patients had gross-total resections, ten of whom developed surgical complications.
  - No differences in recurrence rates were seen between patients who presented with a new diagnosis and patients who had recurrent disease or between patients who underwent a gross-total resection and patients who underwent a near-total resection.
  - Of patients who received postoperative radiation therapy, none had a recurrence.
  - Comparatively, of the 11 patients who either did not receive radiation therapy or were treated preoperatively, 4 had a recurrence (P = .09).
  - Three patients developed distant metastases, and three patients died of disease.
  - A high Ki-67 index was more prevalent among patients with dedifferentiated chordomas. Two of the three patients who died had an elevated Ki-67 index.
2. Pediatric patients with base-of-skull chordomas were treated with proton-beam therapy or a combined proton/photon approach (proton-based; most received 80% proton/20% photon) at the Massachusetts General Hospital from 1981 to 2021. Of 204 patients, the median age at diagnosis was 11.1 years (range, 1–21 years).[12]
  - The chordomas presented in the upper and/or middle clivus in 59% of the patients, lower clivus in 36%, craniocervical junction in 4%, and nasal cavity in 1%.
  - The median overall survival (OS) was 26 years, and the median progression-free survival (PFS) was 25 years. The 5-, 10-, and 20-year OS rates were 84%, 78% and 64%, respectively. The 5-, 10-, and 20-year PFS rates were 74%, 69%, and 64%, respectively.
  - In multivariable actuarial analysis, prognostic factors associated with worse OS included poorly differentiated subtype, radiographical progression prior to radiation therapy, larger treatment volume, and lower clivus location.

### Tyrosine Kinase Inhibitor (TKI) Therapy

Chordomas overexpress PDGFRA, PDGFRB, and KIT. Because of this finding, imatinib mesylate has been studied in adults with chordomas.[13,14]

In one study, 50 adults with chordomas were treated with imatinib and evaluated by Response Evaluation Criteria In Solid Tumors (RECIST) guidelines. One patient had a partial response and 28 additional patients had stable disease at 6 months.[14] The low rate of RECIST responses and the potentially slow natural course of the disease complicate the assessment of the efficacy of imatinib for chordoma.[14]

Other TKIs and combinations involving TKIs have been studied in adults.[15-17]

One multicenter French retrospective study reported five patients who had partial responses to treatment with either imatinib, sorafenib, or erlotinib. The median PFS was 36 months.[18]

### Chemotherapy

There are only a few anecdotal reports of the use of cytotoxic chemotherapy after surgery alone or surgery plus radiation therapy. Treatment with ifosfamide/etoposide and vincristine/doxorubicin/cyclophosphamide was beneficial in some reports.[19,20] The role for chemotherapy in the treatment of this disease is uncertain.

Recurrences are usually local but can include distant metastases to the lungs or bone.

### References

John L, Smith H, Ilanchezhian M, et al.: The NIH pediatric/young adult chordoma clinic and natural history study: Making advances in a very rare tumor. Pediatr Blood Cancer : e30358, 2023.37347686
Yasuda M, Bresson D, Chibbaro S, et al.: Chordomas of the skull base and cervical spine: clinical outcomes associated with a multimodal surgical resection combined with proton-beam radiation in 40 patients. Neurosurg Rev 35 (2): 171-82; discussion 182-3, 2012.21863225
DeLaney TF, Liebsch NJ, Pedlow FX, et al.: Long-term results of Phase II study of high dose photon/proton radiotherapy in the management of spine chordomas, chondrosarcomas, and other sarcomas. J Surg Oncol 110 (2): 115-22, 2014.24752878
Rassi MS, Hulou MM, Almefty K, et al.: Pediatric Clival Chordoma: A Curable Disease that Conforms to Collins' Law. Neurosurgery 82 (5): 652-660, 2018.28521059
Hug EB, Sweeney RA, Nurre PM, et al.: Proton radiotherapy in management of pediatric base of skull tumors. Int J Radiat Oncol Biol Phys 52 (4): 1017-24, 2002.11958897
Noël G, Habrand JL, Jauffret E, et al.: Radiation therapy for chordoma and chondrosarcoma of the skull base and the cervical spine. Prognostic factors and patterns of failure. Strahlenther Onkol 179 (4): 241-8, 2003.12707713
Lim PS, Tran S, Kroeze SGC, et al.: Outcomes of adolescents and young adults treated for brain and skull base tumors with pencil beam scanning proton therapy. Pediatr Blood Cancer 67 (12): e28664, 2020.32881313
Indelicato DJ, Rotondo RL, Mailhot Vega RB, et al.: Local Control After Proton Therapy for Pediatric Chordoma. Int J Radiat Oncol Biol Phys 109 (5): 1406-1413, 2021.33253819
Rombi B, Ares C, Hug EB, et al.: Spot-scanning proton radiation therapy for pediatric chordoma and chondrosarcoma: clinical outcome of 26 patients treated at paul scherrer institute. Int J Radiat Oncol Biol Phys 86 (3): 578-84, 2013.23582853
Rutz HP, Weber DC, Goitein G, et al.: Postoperative spot-scanning proton radiation therapy for chordoma and chondrosarcoma in children and adolescents: initial experience at paul scherrer institute. Int J Radiat Oncol Biol Phys 71 (1): 220-5, 2008.18068310
McDowell MM, Zwagerman NT, Wang EW, et al.: Long-term outcomes in the treatment of pediatric skull base chordomas in the endoscopic endonasal era. J Neurosurg Pediatr 27 (2): 170-179, 2020.33254137
Ioakeim-Ioannidou M, Niemierko A, Kim DW, et al.: Surgery and proton radiation therapy for pediatric base of skull chordomas: Long-term clinical outcomes for 204 patients. Neuro Oncol 25 (9): 1686-1697, 2023.37029730
Casali PG, Messina A, Stacchiotti S, et al.: Imatinib mesylate in chordoma. Cancer 101 (9): 2086-97, 2004.15372471
Stacchiotti S, Longhi A, Ferraresi V, et al.: Phase II study of imatinib in advanced chordoma. J Clin Oncol 30 (9): 914-20, 2012.22331945
Lindén O, Stenberg L, Kjellén E: Regression of cervical spinal cord compression in a patient with chordoma following treatment with cetuximab and gefitinib. Acta Oncol 48 (1): 158-9, 2009.18752082
Singhal N, Kotasek D, Parnis FX: Response to erlotinib in a patient with treatment refractory chordoma. Anticancer Drugs 20 (10): 953-5, 2009.19730087
Stacchiotti S, Marrari A, Tamborini E, et al.: Response to imatinib plus sirolimus in advanced chordoma. Ann Oncol 20 (11): 1886-94, 2009.19570961
Lebellec L, Chauffert B, Blay JY, et al.: Advanced chordoma treated by first-line molecular targeted therapies: Outcomes and prognostic factors. A retrospective study of the French Sarcoma Group (GSF/GETO) and the Association des Neuro-Oncologues d'Expression Française (ANOCEF). Eur J Cancer 79: 119-128, 2017.28478340
Dhall G, Traverso M, Finlay JL, et al.: The role of chemotherapy in pediatric clival chordomas. J Neurooncol 103 (3): 657-62, 2011.21052774
Al-Rahawan MM, Siebert JD, Mitchell CS, et al.: Durable complete response to chemotherapy in an infant with a clival chordoma. Pediatr Blood Cancer 59 (2): 323-5, 2012.21922644

## Treatment Options Under Clinical Evaluation for Childhood Chordoma

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- PEPN2121 (NCT05286801) (https://www.cancer.gov/clinicaltrials/NCT05286801) (Tiragolumab and Atezolizumab for the Treatment of Relapsed or Refractory SMARCB1- or SMARCA4-Deficient Tumors): This study is evaluating the combination of a PD-L1 targeting antibody (atezolizumab) with a TIGIT targeting antibody (tiragolumab) for patients with SMARCB1- or SMARCA4-deficient tumors.

## Latest Updates to This Summary (04/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Prognosis and Molecular Features

Added text about the results of a retrospective study that analyzed whole-exome and mitochondrial DNA genome sequencing of 29 chordomas from 23 pediatric patients and compared the findings with the results of whole-genome sequencing of chordomas from 80 adult patients (cited O'Halloran et al. as reference 13).

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric chordoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Chordoma Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Chordoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/bone/hp/child-chordoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 31909945]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).